# Cervical Cancer Treatment

Patient Version

This PDQ cancer information summary has current information about the treatment of cervical cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## What Is Cervical Cancer?

Cervical cancer is cancer that starts in the cells of the cervix. The cervix is the lower, narrow end of the uterus (womb). The cervix connects the uterus to the vagina (birth canal). Cervical cancer usually develops slowly over time. Before cancer appears in the cervix, the cells of the cervix go through changes known as dysplasia, in which abnormal cells begin to appear in the cervical tissue. Over time, if not destroyed or removed, the abnormal cells may become cancer cells and start to grow and spread more deeply into the cervix and to surrounding areas.

Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.

Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.

The cervix has two main parts:

- The ectocervix (also called exocervix) is the outer part of the cervix that can be seen during a gynecologic exam. The ectocervix is covered with thin, flat cells called squamous cells.
- The endocervix is the inner part of the cervix that forms a canal that connects the vagina to the uterus. The endocervix is covered with column-shaped glandular cells that make mucus.

The squamocolumnar junction (also called the transformation zone) is the border where the endocervix and ectocervix meet. Most cervical cancers begin in this area.

Anatomy of the cervix. The cervix is the lower, narrow end of the uterus that connects the uterus to the vagina. It is made up of the internal OS (the opening between the cervix and the upper part of the uterus), the endocervix (the inner part of the cervix that forms the endocervical canal), the ectocervix (the outer part of the cervix that opens into the vagina) and the external OS (the opening between the cervix and vagina). The area where the endocervix and ectocervix meet is called the squamocolumnar junction, which contains both glandular cells (column-shaped cells that make mucus) from the endocervix and squamous cells (thin, flat cells) from the ectocervix. The squamocolumnar junction is sometimes referred to as the transformation zone.

Drawing of the anatomy of the cervix showing the internal OS, endocervical canal, endocervix, ectocervix, and external OS. The uterus and vagina are also shown. There is also a pullout that shows a close up of the squamocolumnar junction (the area where the endocervix and ectocervix meet) and the cells that line the endocervix and ectocervix.

### Types of cervical cancer

Cervical cancers are named after the type of cell where the cancer started. The two main types are:

- Squamous cell carcinoma: Most cervical cancers (up to 90%) are squamous cell carcinomas. These cancers develop from cells in the ectocervix.
- Adenocarcinoma: Cervical adenocarcinomas develop in the glandular cells of the endocervix. Clear cell adenocarcinoma, also called clear cell carcinoma or mesonephroma, is a rare type of cervical adenocarcinoma.

Sometimes, cervical cancer has features of both squamous cell carcinoma and adenocarcinoma. This is called mixed carcinoma or adenosquamous carcinoma. Very rarely, cancer develops in other cells in the cervix.

### Learn more about cervical cancer

Symptoms (https://www.cancer.gov/types/cervical/symptoms)

Many cervical cancer symptoms are also seen with other, less serious conditions. These are the warning signs you shouldn’t ignore.

Causes, Risk Factors, and Prevention (https://www.cancer.gov/types/cervical/causes-risk-prevention)

Long-lasting HPV infection causes almost all cervical cancers. Learn about HPV infection and other risk factors for cervical cancer and what you can do to lower your risk.

Screening (https://www.cancer.gov/types/cervical/screening)

If you have a cervix, screening for cervical cancer is an important part of routine health care. Learn when to get screened and what to expect during and after screening.

HPV and Pap Test Results (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results)

Learn what HPV and Pap test results mean and next steps if a test result is abnormal.

Diagnosis (https://www.cancer.gov/types/cervical/diagnosis)

Learn about the tests that are used to diagnose and stage cervical cancer.

Prognosis and Survival Rates (https://www.cancer.gov/types/cervical/survival)

Learn about cervical cancer survival rates and why this statistic doesn't predict exactly what will happen to you.

Stages (https://www.cancer.gov/types/cervical/stages)

Stage refers to the extent of your cancer, such as how large the tumor is and if it has spread. Learn about cervical cancer stages, an important factor in deciding your treatment plan.

Treatment (https://www.cancer.gov/types/cervical/treatment)

Learn about the different ways cervical cancer can be treated.

Childhood Cervical and Vaginal Cancers (https://www.cancer.gov/types/cervical/childhood-cervical-vaginal-cancer)

Cervical cancer and vaginal cancer are very rare in children. Learn about the signs and symptoms, diagnosis, and treatment options.

Coping and Support (https://www.cancer.gov/types/cervical/coping)

Certain aspects of cervical cancer diagnosis and treatment are of special concern. Gain a greater sense of control by knowing what to expect and what resources are available to help you cope.

## Cervical Cancer Symptoms

Early on, cervical cancer usually doesn’t have symptoms, making it hard to detect. Symptoms usually begin after the cancer has spread.

When symptoms of early-stage cervical cancer do occur, they may include

- vaginal bleeding after sex
- vaginal bleeding after menopause
- vaginal bleeding between periods or periods that are heavier or longer than normal
- vaginal discharge that is watery and has a strong odor or that contains blood
- pelvic pain or pain during sex

Symptoms of advanced cervical cancer (cancer has spread beyond the cervix to other parts of the body) may include the symptoms of early-stage cervical cancer and

- difficult or painful bowel movements or bleeding from the rectum when having a bowel movement
- difficult or painful urination or blood in the urine
- dull backache
- swelling of the legs
- pain in the abdomen
- feeling tired

These symptoms may be caused by many conditions other than cervical cancer. The only way to know is to see a health professional. If it is cervical cancer, ignoring symptoms can delay treatment and make it less effective.

Learn how cervical cancer screening (https://www.cancer.gov/types/cervical/screening) can help prevent cervical cancer or find it early.

## Cervical Cancer Diagnosis

If you have symptoms or screening test results that suggest the possibility of cervical cancer, your doctor will do follow-up tests to find out if it is due to cancer or some other cause. They will usually start by asking about your personal and family medical history and by doing a physical exam, which will include a pelvic exam and rectovaginal exam. They may recommend diagnostic tests to find out if you have cervical cancer, and if so, whether it has spread to another part of the body. The results of these tests will also help you and your doctor plan treatment.

### How cervical cancer is diagnosed

The following procedures are used to diagnose cervical cancer:

#### Colposcopy

Colposcopy is a procedure in which the health care provider inserts a speculum to gently open the vagina and view the cervix. A vinegar solution will be applied to the cervix to help show abnormal areas. The health care provider then places an instrument called a colposcope close to the vagina. It has a bright light and a magnifying lens and allows the health care provider to look closely at the cervix. A colposcopy usually includes a biopsy.

#### Biopsy

Biopsy is a procedure in which a sample of tissue is removed from the cervix so that a pathologist can view it under a microscope to check for signs of cancer. The following types of biopsies are used to check for cervical cancer:

- Punch biopsy is a procedure in which a small, round piece of tissue is removed using a sharp, hollow circular instrument. Sometimes several different areas of the cervix will be checked with punch biopsy. This procedure is usually done in the doctor’s office.
- Endocervical curettage is a procedure to collect cells or tissue from the cervical canal using a curette (spoon-shaped instrument). This procedure removes only a small amount of tissue and is usually done in the doctor’s office.
- Loop electrosurgical excision procedure (LEEP) uses a thin wire loop, through which an electrical current is passed, to remove tissue from the cervix. LEEP may be used to diagnose cervical cancer. It also may be used to remove precancer or early-stage cancer. This procedure is typically done in a doctor’s office. It usually takes only a few minutes, and local anesthesia is used to numb the area.
- Cone biopsy is surgery to remove a larger, cone-shaped piece of tissue from the cervix and cervical canal. A cone biopsy may be used to diagnose cervical cancer. It also may be used to remove precancer or early-stage cancer. This procedure is also called conization. A cone biopsy is done at the hospital under general anesthesia.

Talk with your health care provider to learn what to expect during and after your biopsy procedure. Some people have bleeding and/or discharge after a biopsy. Others have pain that feels like cramps during menstruation.

To learn about the type of information that can be found in a pathologist’s report about the cells or tissue removed during a biopsy, see Pathology Reports (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/pathology-reports-fact-sheet).

### Tests and procedures used to stage cervical cancer

If you are diagnosed with cervical cancer, you will be referred to a gynecologic oncologist. This is a doctor who specializes in staging and treating cervical cancer and other cancers of the female reproductive system. They will recommend tests to determine the extent (stage) of cancer. Sometimes the cancer is only in the cervix. Or, it may have spread from the cervix to other parts of the body. The process of learning the extent of cancer in the body is called staging. It is important to know the stage of the cervical cancer in order to plan the best treatment.

For information about a specific stage of cervical cancer, see Cervical Cancer Stages (https://www.cancer.gov/types/cervical/stages).

The following procedures may be used to determine the cervical cancer stage:

#### Imaging tests

- PET-CT scan combines the pictures from a positron emission tomography (PET) scan and a computed tomography (CT) scan. The PET and CT scans are done at the same time on the same machine. The pictures from both scans are combined to make a more detailed picture than either test would make by itself.
  - For the PET scan, a small amount of radioactive glucose (sugar) is injected into a vein. The scanner rotates around the body and makes a picture of where glucose is being used in the body. Malignant tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells.
  - For the CT scan, a series of detailed x-ray pictures of areas inside the body is taken from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly.
- Magnetic resonance imaging (MRI) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging.
- Ultrasound uses high-energy sound waves (ultrasound), which bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.
- Chest x-ray is an x-ray of the organs and bones inside the chest. An x-ray is a type of high-energy radiation that can go through the body and onto film, making a picture of areas inside the chest.

#### Lab tests

- Complete blood count (CBC) is a blood test that measures the following in a sample of blood:
  - the number of red blood cells, white blood cells, and platelets
  - the amount of hemoglobin (the protein that carries oxygen) in the red blood cells
  - the portion of the blood sample made up of red blood cells
- Blood chemistry study is a blood test that measures the amounts of certain substances released into the blood by organs and tissues in the body, including electrolytes, lactate dehydrogenase, uric acid, blood urea nitrogen, creatinine, and liver function values. An unusual (higher or lower than normal) amount of a substance can be a sign of cancer spread or other diseases.

#### Visual examination

- Cystoscopy is a procedure to look inside the bladder and urethra to check for abnormal areas. A cystoscope is inserted through the urethra into the bladder. A cystoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue samples, which are checked under a microscope for signs of cancer.
- Sigmoidoscopy uses a sigmoidoscope to look inside the rectum and sigmoid (lower) colon for abnormal areas. A sigmoidoscope is inserted through the rectum into the sigmoid colon. A sigmoidoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue samples, which are checked under a microscope for signs of cancer.

### Getting a second opinion

Some people want to get a second opinion to confirm their cervical cancer diagnosis and treatment plan. If you choose to seek a second opinion, you will need to get important medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans before giving a recommendation. The doctor who gives the second opinion may agree with your first doctor, suggest changes or another approach, or provide more information about your cancer.

For questions you might want to ask at your appointments, see Questions to Ask Your Doctor (https://www.cancer.gov/about-cancer/coping/questions).

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can also contact NCI’s Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor, hospital, or getting a second opinion.

## Cervical Cancer Prognosis and Survival Rates

If you have been diagnosed with cervical cancer, you may have questions about how serious the cancer is and your chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis for cervical cancer depends on many factors:

- the stage of the cancer (the size of the tumor and whether the cancer has spread beyond the cervix)
- the type of cervical cancer (adenocarcinoma or squamous cell carcinoma)
- your age and general health
- whether you have other health problems or diseases, including if you are immunocompromised or have HIV
- whether the cancer is newly diagnosed or has recurred (come back)

### Survival rates for cervical cancer

Doctors estimate cervical cancer prognosis by using statistics collected over many years from people with cervical cancer. One statistic that is commonly used in making a prognosis is the 5-year relative survival rate. The 5-year relative survival rate tells you what percent of people with the same type and stage of cervical cancer are alive 5 years after their cancer was diagnosed, compared with people in the overall population. For example, the 5-year relative survival rate for cervical cancer diagnosed at an early stage is 91%. This means that people diagnosed with early-stage cervical cancer are 91% as likely as people who do not have cervical cancer to be alive 5 years after diagnosis. The 5-year relative survival rates for cervical cancer are as follows:

- When cervical cancer is diagnosed at an early stage, the 5-year relative survival rate is 91%.
- When cervical cancer is diagnosed after it has spread to nearby tissues, organs, or regional lymph nodes, the 5-year relative survival rate is 60%.
- When cervical cancer is diagnosed after it has spread to a distant part of the body, the 5-year relative survival rate is 19%.
- The 5-year relative survival rate for all people with cervical cancer is 67%.

Learn more about statistics for cervical cancer, from our Cancer Stat Facts Collection. (https://seer.cancer.gov/statfacts/html/cervix.html)

### Understanding survival rate statistics

Because prognosis statistics are based on large groups of people, they cannot be used to predict exactly what will happen to you. The doctor who knows the most about your situation is in the best position to discuss these statistics and talk with you about your prognosis. It is important to note the following when reviewing survival statistics:

- No two people are entirely alike, and responses to treatment can vary greatly.
- Survival statistics use information collected from large groups of people who may have received different types of treatment.
- It takes several years to see the effect of newer and better treatments, so these effects may not be reflected in current survival statistics.

To learn more about survival statistics and to see videos of patients and their doctors exploring their feelings about prognosis, see Understanding Cancer Prognosis (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis).

## Cervical Cancer Stages

A cancer stage describes the extent of cancer in the body, especially whether the cancer has spread from where it first formed to other parts of the body. It is important to know the stage of cervical cancer in order to plan the best treatment.

The International Federation of Gynecology and Obstetrics staging system is used for cervical cancer. Learn about tests and procedures used to determine the stage of cervical cancer (https://www.cancer.gov/types/cervical/diagnosis).

### Stage I cervical cancer

In stage I, cervical cancer has formed and is found in the cervix only. It is divided into stages IA and IB, based on the size of the tumor and the deepest point of tumor invasion.

Stage IA is subdivided based on the deepest point of tumor invasion.

Stage IA1 and IA2 cervical cancer. A very small amount of cancer that can only be seen under a microscope is found in the tissues of the cervix. In stage IA1, the cancer is not more than 3 millimeters deep. In stage IA2, the cancer is more than 3 but not more than 5 millimeters deep.

Stage IA1 and IA2 cervical cancer; drawing shows a cross-section of the cervix and vagina. An inset shows cancer cells in the cervix that can only be seen under a microscope. The cancer in stage IA1 is not more than 3 mm deep. The cancer in stage IA2 is more than 3 but not more than 5 mm deep.

- Stage IA1: A very small amount of cancer that can only be seen with a microscope is found in the tissues of the cervix. The deepest point of tumor invasion is 3 millimeters or less.
- Stage IA2: A very small amount of cancer that can only be seen with a microscope is found in the tissues of the cervix. The deepest point of tumor invasion is more than 3 millimeters but not more than 5 millimeters.
  Millimeters (mm). A sharp pencil point is about 1 mm, a new crayon point is about 2 mm, and a new pencil eraser is about 5 mm.
  Millimeters; drawing shows millimeters (mm) using everyday objects. A sharp pencil point shows 1 mm, a new crayon point shows 2 mm, and a new pencil-top eraser shows 5 mm.

Stage IB is subdivided based on the size of the tumor and the deepest point of tumor invasion.

- Stage IB1: The tumor is 2 centimeters or smaller and the deepest point of tumor invasion is more than 5 millimeters.
  Stage IB1 cervical cancer. The cancer is 2 centimeters or smaller and is more than 5 millimeters deep.
  Stage IB1 cervical cancer; drawing shows a cross-section of the cervix and vagina and cancer in the cervix that is smaller than 2 cm. An inset shows cancer that is more than 5 mm deep. Also shown is a 2-cm scale that shows 10 mm is equal to 1 cm.
- Stage IB2: The tumor is larger than 2 centimeters but not larger than 4 centimeters.
  Stage IB2 and IB3 cervical cancer. In stage IB2, the cancer is larger than 2 centimeters but not larger than 4 centimeters. In stage IB3, the cancer is larger than 4 centimeters.
  Stage IB2 and IB3 cervical cancer; drawing shows two cross-sections of the cervix and vagina. The drawing on the left shows stage IB2 cancer in the cervix that is larger than 2 cm but not larger than 4 cm. The drawing on the right shows stage IB3 cancer in the cervix that is larger than 4 cm.
- Stage IB3: The tumor is larger than 4 centimeters.
  Tumor sizes are often measured in centimeters (cm) or inches. Common food items that can be used to show tumor size in cm include: a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm or 2 inches), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm or 4 inches).
  Drawing shows different sizes of a tumor in centimeters (cm) compared to the size of a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm). Also shown is a 10-cm ruler and a 4-inch ruler.

Learn about treatment of stage I cervical cancer (https://www.cancer.gov/types/cervical/treatment/by-stage).

Learn about treatment of cervical cancer during pregnancy (https://www.cancer.gov/types/cervical/treatment/cancer-treatment-during-pregnancy).

### Stage II cervical cancer

In stage II, cervical cancer has spread to the upper two-thirds of the vagina or to the tissue around the uterus.

Stage II is subdivided based on how far the cancer has spread.

Stage II cervical cancer. In stages IIA1 and IIA2, cancer has spread from the cervix to the upper two-thirds of the vagina but has not spread to the tissue around the uterus. In stage IIA1, the cancer is 4 centimeters or smaller. In stage IIA2, the cancer is larger than 4 centimeters. In stage IIB, cancer has spread from the cervix to the tissue around the uterus.

Stage II cervical cancer; drawing shows two cross-sections of the uterus, cervix, and vagina. The drawing on the left shows stages IIA1 and IIA2 cancer in the cervix that is 4 cm and has spread to the upper two-thirds of the vagina. The drawing on the right shows stage IIB cancer that has spread from the cervix to the tissue around the uterus.

- Stage IIA: Cancer has spread from the cervix to the upper two-thirds of the vagina but has not spread to the tissue around the uterus. Stage IIA is further divided based on the size of the tumor:
  - Stage IIA1: The tumor is 4 centimeters or smaller.
  - Stage IIA2: The tumor is larger than 4 centimeters.
- Stage IIB: Cancer has spread from the cervix to the tissue around the uterus.

Learn about treatment of stage II cervical cancer (https://www.cancer.gov/types/cervical/treatment/by-stage).

Learn about treatment of cervical cancer during pregnancy (https://www.cancer.gov/types/cervical/treatment/cancer-treatment-during-pregnancy).

### Stage III cervical cancer

In stage III, cervical cancer has spread to the lower third of the vagina and/or to the pelvic wall, and/or has caused kidney problems, and/or involves lymph nodes.

Stage III is subdivided based on how far the cancer has spread.

- Stage IIIA: Cancer has spread to the lower third of the vagina but has not spread to the pelvic wall.
  Stage IIIA cervical cancer. Cancer has spread to the lower third of the vagina but has not spread to the pelvic wall.
  Stage IIIA cervical cancer; drawing shows a cross-section of the cervix and vagina. Cancer is shown in the cervix and in the full length of the vagina.
- Stage IIIB: Cancer has spread to the pelvic wall; and/or the tumor has become large enough to block one or both ureters or has caused one or both kidneys to get bigger or stop working.
  Stage IIIB cervical cancer. Cancer has spread to the pelvic wall and/or the tumor has become large enough to block one or both ureters or has caused one or both kidneys to get bigger or stop working.
  Stage IIIB cervical cancer; drawing shows cancer in the cervix and pelvic wall. Also shown is cancer blocking the right ureter and an enlarged right ureter and right kidney. The uterus, bladder, and vagina are also shown.
- Stage IIIC: Stage IIIC is divided into stages IIIC1 and IIIC2, based on the spread of cancer to the lymph nodes.
  Stage IIIC cervical cancer. In stage IIIC1, cancer has spread to lymph nodes in the pelvis. In stage IIIC2, cancer has spread to lymph nodes in the abdomen near the aorta.
  Stage IIIC cervical cancer; drawing shows stage IIIC1 cancer that has spread from the cervix to lymph nodes in the pelvis and stage IIIC2 cancer that has spread from the cervix to lymph nodes in the abdomen near the aorta.

Learn about treatment of stage III cervical cancer (https://www.cancer.gov/types/cervical/treatment/by-stage).

Learn about treatment of cervical cancer during pregnancy (https://www.cancer.gov/types/cervical/treatment/cancer-treatment-during-pregnancy).

### Stage IV cervical cancer

In stage IV, cervical cancer has spread beyond the pelvis, or has spread to the lining of the bladder or rectum, or has spread to other parts of the body.

Stage IV is subdivided into stages IVA and IVB, based on where the cancer has spread.

- Stage IVA: Cancer has spread to nearby pelvic organs, such as the bladder or rectum.
  Stage IVA cervical cancer. Cancer has spread to nearby pelvic organs, such as the bladder or rectum.
  Stage IVA cervical cancer; drawing and inset show cancer that has spread from the cervix to the bladder and rectal wall.
- Stage IVB: Cancer has spread to other parts of the body, such as the liver, lungs, bones, or distant lymph nodes.
  Stage IVB cervical cancer. Cancer has spread to other parts of the body, such as the lymph nodes, lung, liver, or bone.
  Stage IVB cervical cancer; drawing shows other parts of the body where cervical cancer may spread, including the lymph nodes, lung, liver, and bone. An inset shows cancer cells spreading from the cervix, through the blood and lymph system, to another part of the body where metastatic cancer has formed.

Stage IV is also called metastatic cancer. Metastatic cancer happens when cancer cells travel through the lymphatic system or blood and form tumors in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor. For example, if cervical cancer spreads to the lung, the cancer cells in the lung are actually cervical cancer cells. The disease is called metastatic cervical cancer, not lung cancer. Learn more in Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

Learn about treatment options for stage IV cervical cancer (https://www.cancer.gov/types/cervical/treatment/by-stage).

Learn about treatment of cervical cancer during pregnancy (https://www.cancer.gov/types/cervical/treatment/cancer-treatment-during-pregnancy).

### Recurrent cervical cancer

Recurrent cervical cancer is cancer that has recurred (come back) after it has been treated. The cancer may come back in the cervix or as metastatic tumors in other parts of the body. Tests will be done to help determine where the cancer has returned in your body, if it has spread, and how far. The type of treatment that you have for recurrent cervical cancer will depend on how far it has spread.

Learn about treatment of recurrent cervical cancer (https://www.cancer.gov/types/cervical/treatment/by-stage#_24).

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer).

Information to help you cope and talk with your health care team is shared in this booklet: When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

## Cervical Cancer Treatment

Different types of treatment are available for cervical cancer. You and your cancer care team will work together to decide your treatment plan, which may include more than one type of treatment. Many factors will be considered, such as the stage of the cancer, your overall health, and your preferences. Your treatment plan will include information about your cancer, the goals of treatment, the treatment options and possible side effects, and the expected length of treatment.

If you are concerned about whether treatment will affect your fertility, talk with your cancer care team before treatment begins about what to expect. To learn about fertility preservation options and ways to find support, visit Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women).

For information about treatments by stage of cervical cancer, visit Cervical Cancer Treatment by Stage (https://www.cancer.gov/types/cervical/treatment/by-stage).

For information about treatment during pregnancy, visit Cervical Cancer Treatment during Pregnancy (https://www.cancer.gov/types/cervical/treatment/cancer-treatment-during-pregnancy).

### Surgery

Surgery (also called an operation) is sometimes used to treat cervical cancer. The type of surgery depends on where the cancer is located. Learn more about Surgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery).

The following surgical procedures may be used:

#### Cold knife conization

Cold knife conization uses a scalpel to remove a cone-shaped piece of tissue from the cervix and cervical canal. Sometimes all the cancer can be removed during this procedure. Cold knife conization is done in the hospital under general anesthesia.

Conization may also be used to treat high-grade cervical cell changes (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results#_35).

#### Sentinel lymph node biopsy

Sentinel lymph node biopsy removes the sentinel lymph node during surgery. The sentinel lymph node is the first lymph node in a group of lymph nodes to receive lymphatic drainage from the primary tumor. It is therefore the first lymph node the cancer is likely to spread to from the primary tumor. To identify the sentinel lymph node, a radioactive substance and/or blue dye is injected near the tumor. The substance or dye flows through the lymph ducts to the lymph nodes. The first lymph node to receive the substance or dye is removed. A pathologist views the tissue under a microscope to look for cancer cells. If cancer cells are found, more lymph nodes will be removed through a separate incision (cut). This is called a lymph node dissection. After the sentinel lymph node biopsy, the surgeon removes the cancer.

Learn more about Sentinel Lymph Node Biopsy (https://www.cancer.gov/about-cancer/diagnosis-staging/staging/sentinel-node-biopsy-fact-sheet).

#### Hysterectomy

A hysterectomy is surgery to remove the uterus. As a treatment for cervical cancer, the cervix, and sometimes the surrounding structures, are removed. Several types of hysterectomy may be used to treat cervical cancer:

- Total hysterectomy removes the uterus and the cervix. When the surgery is done entirely through the vagina (with no incisions on the abdomen) and the uterus and cervix are removed through the vagina, the operation is called a total vaginal hysterectomy. If the surgery is done through a large incision on the abdomen (either vertical or horizontal) and the uterus and cervix are removed through this incision, the operation is called a total abdominal hysterectomy. If the surgery is done through small incisions on the abdomen, the operation is called a total laparoscopic hysterectomy. The uterus and cervix are usually taken out through the vagina, although sometimes an abdominal incision is made to remove the uterus and cervix.
  Hysterectomy. The uterus is surgically removed with or without other organs or tissues. In a total hysterectomy, the uterus and cervix are removed. In a total hysterectomy with salpingo-oophorectomy, (a) the uterus plus one (unilateral) ovary and fallopian tube are removed; or (b) the uterus plus both (bilateral) ovaries and fallopian tubes are removed. In a radical hysterectomy, the uterus, cervix, both ovaries, both fallopian tubes, and nearby tissue are removed. These procedures are done using a low transverse incision or a vertical incision.
  Hysterectomy; drawing shows the female reproductive anatomy, including the ovaries, uterus, vagina, fallopian tubes, and cervix. Dotted lines show which organs and tissues are removed in a total hysterectomy, a total hysterectomy with salpingo-oophorectomy, and a radical hysterectomy. An inset shows the location of two possible incisions on the abdomen: a low transverse incision is just above the pubic area and a vertical incision is between the navel and the pubic area.
- Radical hysterectomy removes the uterus, cervix, part of the vagina, and a wide area of ligaments and tissues around these organs. The ovaries, fallopian tubes, or nearby lymph nodes may also be removed.
- Modified radical hysterectomy removes the uterus, cervix, upper part of the vagina, and ligaments and tissues that closely surround these organs. This type of surgery removes fewer tissues and/or organs than radical hysterectomy. The ovaries, fallopian tubes, or nearby lymph nodes may also be removed.

#### Radical trachelectomy

Radical trachelectomy (also called radical cervicectomy) removes the cervix, nearby tissue, and the upper part of the vagina. Lymph nodes may also be removed. After the surgeon removes the cervix, they attach the uterus to the remaining part of the vagina. A special stitch or band is placed on the uterus (in a procedure called a cerclage) to help keep the uterus closed during pregnancy. If you have this surgery, you may still be able to become pregnant.

#### Bilateral salpingo-oophorectomy

Bilateral salpingo-oophorectomy removes both ovaries and both fallopian tubes. This is done when the cancer has spread to these organs.

#### Total pelvic exenteration

Total pelvic exenteration removes the lower colon, rectum, and bladder. The cervix, vagina, ovaries, and nearby lymph nodes are also removed. Artificial openings (stoma) are made for urine and stool to flow from the body to a collection bag. Plastic surgery may be needed to make an artificial vagina after this operation.

### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing by damaging their DNA. The two main types of radiation therapy are external radiation therapy and internal radiation therapy (also called brachytherapy).

Both external and internal radiation therapy are used to treat cervical cancer and may also be used as palliative therapy to relieve symptoms and improve quality of life in people with advanced cervical cancer.

#### External radiation therapy

External beam radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. Intensity-modulated radiation therapy (IMRT) is a way of giving external radiation therapy that can help keep radiation from damaging nearby healthy tissue.

IMRT is a type of 3-dimensional (3-D) radiation therapy that uses a computer to make pictures of the size and shape of the tumor. Thin beams of radiation of different intensities (strengths) are aimed directly at the tumor from many angles. IMRT is being studied for the treatment of cervical cancer.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam).

#### Internal radiation therapy

Internal radiation therapy uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer. Internal radiation therapy is also called brachytherapy.

Learn more about Brachytherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/brachytherapy).

### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. Chemotherapy may be given alone or with other types of treatment.

Chemotherapy drugs used to treat cervical cancer include:

- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
- gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride)
- ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide)
- irinotecan (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride)
- paclitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/paclitaxel)
- topotecan (https://www.cancer.gov/about-cancer/treatment/drugs/topotecanhydrochloride)
- vinorelbine (https://www.cancer.gov/about-cancer/treatment/drugs/vinorelbinetartrate)

Combinations of these drugs may be used. Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works against cancer, how it is given, common side effects, and more in Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

### Targeted therapy

Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, or other molecules involved in the growth and spread of cancer cells.

Targeted therapies used to treat cervical cancer include:

- bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab)
- tisotumab vedotin (https://www.cancer.gov/about-cancer/treatment/drugs/tisotumabvedotin-tftv)

Learn more about how targeted therapy works against cancer, how it is given, possible side effects, and more in Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### Immunotherapy

Immunotherapy helps a person's immune system fight cancer. Biomarker tests can be used to help predict your response to certain immunotherapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab) is an immunotherapy drug used to treat certain patients whose cervical cancer has the biomarker PD-L1.

Learn more about how immunotherapy works against cancer, how it is given, possible side effects, and more in Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

### Clinical trials

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Follow-up care during and after treatment

As you go through treatment, you will have follow-up tests or checkups. Some of the tests that were done to diagnose cervical cancer or to find out the stage of the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

Tell your doctor if you have any of the following signs or symptoms, which may mean the cancer has come back:

- vaginal bleeding or discharge
- pain in the abdomen, back, or leg
- swelling in the leg
- trouble urinating
- change in your bowel movements
- cough
- feeling tired

For cervical cancer, follow-up tests are usually done every 3 to 4 months for the first 2 years, followed by checkups every 6 months. The checkup includes a current health history and exam of the body to check for signs and symptoms of recurrent cervical cancer and for late effects of treatment. A Pap test may or may not be done during your visits.

Learn more about what to expect when treatment ends (https://www.cancer.gov/about-cancer/coping/survivorship).

## Cervical Cancer Treatment by Stage

The cancer stage (the extent of cancer in the body) is an important factor in deciding the best treatment for cervical cancer. Other factors, such as your preferences and overall health, are also important.

An important factor for some women is fertility preservation. If you would like to retain the ability to become pregnant, ask your doctor about fertility-sparing treatment options (treatments for cervical cancer that preserve the uterus and ovaries). Such treatments may be an option for some small cancers that are only in the cervix. If your cancer is more advanced or has a high chance of coming back, you are more likely to have treatments that will prevent you from becoming pregnant. A reproductive endocrinologist can help you understand your options for becoming a parent, such as freezing eggs. To learn more about fertility preservation options and ways to find support, visit Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women).

For some people, taking part in a clinical trial may be an option. Clinical trials of new cancer drugs or treatment combinations may be available. Learn more about clinical trials, including how to find and join a trial at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of stage IA cervical cancer

Stage IA cervical cancer is separated into stage IA1 and IA2.

Treatment of stage IA1 cervical cancer may include:

- cold knife conization, a fertility-sparing procedure, for some small cancers
- total hysterectomy with or without bilateral salpingo-oophorectomy, for patients whose cancer has a high risk of coming back

Treatment of stage IA2 cervical cancer may include:

- modified radical hysterectomy and removal of lymph nodes
- radical trachelectomy, a fertility-sparing surgery, and removal of lymph nodes
- internal radiation therapy, for patients who cannot have surgery

To learn more about these treatments, visit Cervical Cancer Treatment (https://www.cancer.gov/types/cervical/treatment).

### Treatment of stages IB and IIA cervical cancer

Treatment of stage IB and stage IIA cervical cancer may include:

- radiation therapy given at the same time as chemotherapy
- radical hysterectomy and removal of pelvic lymph nodes with or without radiation therapy to the pelvis, plus chemotherapy
- radical trachelectomy, a fertility-sparing surgery
- radiation therapy alone
- immunotherapy

When radiation is used, it may be given as external radiation therapy only or as a combination of external and internal radiation therapy. Chemotherapy drugs, such as cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin) or carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin), may be given at the same time as radiation therapy. Giving chemotherapy at the same time as radiation therapy helps the radiation therapy work better.

To learn more about these treatments, visit Cervical Cancer Treatment (https://www.cancer.gov/types/cervical/treatment).

### Treatment of stages IIB, III, and IVA cervical cancer

Treatment of stage IIB, stage III, and stage IVA cervical cancer may include:

- radiation therapy given at the same time as chemotherapy
- surgery to remove pelvic lymph nodes followed by radiation therapy with or without chemotherapy
- immunotherapy

Most people with stage IIB, III, or IVA cervical cancer will receive a combination of external and internal radiation therapy. Chemotherapy drugs, such as cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin) or carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin), may be given at the same time as radiation therapy. Giving chemotherapy at the same time as radiation therapy helps the radiation therapy work better.

Learn more about these treatments at Cervical Cancer Treatment (https://www.cancer.gov/types/cervical/treatment).

### Treatment of stage IVB and recurrent cervical cancer

Treatment of stage IVB and cervical cancer that has recurred (come back) may include:

- The immunotherapy drug pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab) given alone or with other treatments, such as chemotherapy and the targeted therapy drug bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab).
- Radiation therapy and chemotherapy given at the same time, for cancer that has come back in the pelvis. Radiation may be given as external radiation therapy only or as a combination of external and internal radiation therapy. Many different chemotherapy drugs are used to treat recurrent cervical cancer, including cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin), carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin), ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide), irinotecan (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride), gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride), paclitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/paclitaxel), topotecan (https://www.cancer.gov/about-cancer/treatment/drugs/topotecanhydrochloride), and vinorelbine (https://www.cancer.gov/about-cancer/treatment/drugs/vinorelbinetartrate). These drugs may be given alone or in combination. Giving chemotherapy at the same time as radiation therapy helps the radiation therapy work better.
- Chemotherapy and bevacizumab as palliative therapy. Many different chemotherapy drugs are used as palliative therapy for recurrent cervical cancer, including cisplatin, carboplatin, ifosfamide, irinotecan, gemcitabine, paclitaxel, topotecan, and vinorelbine. These drugs may be given alone or in combination.
  Palliative therapy is treatment meant to improve the quality of life of people who have a serious or life-threatening disease, such as cancer. Many of the same treatments for cancer, such as chemotherapy or other kinds of drugs and radiation therapy, can also be used for palliative therapy to help a patient feel more comfortable. Learn more about Palliative Care in Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/palliative-care-fact-sheet).
- Pelvic exenteration, for certain people who cannot have radiation therapy. The goal of pelvic exenteration is to cure the cancer by removing it from all the organs to which it has spread.

To learn more about these treatments, visit Cervical Cancer Treatment (https://www.cancer.gov/types/cervical/treatment).

## Cervical Cancer Treatment during Pregnancy

Cervical cancer during pregnancy is rare. When it occurs, the cancer is usually found early and confined to the cervix, and it may not need to be treated immediately. But sometimes the cancer is fast-growing or found at a later stage and needs immediate treatment. Before treatment begins, it is important to discuss the benefits and risks of all your treatment options, including how treatment could affect you, your pregnancy, and your future fertility. Your cancer care team will consider your personal wishes when helping you decide the best treatment.

Typically, treatment depends on your trimester of pregnancy.

### Treatment of slow-growing stage I cervical cancer in the first trimester

If you have a type of slow-growing cervical cancer that is diagnosed in stage I, are less than 3 months pregnant, and want to continue your pregnancy, your cancer care team might suggest that you delay treatment until later in your pregnancy or after delivery.

Your cancer care team may also suggest you deliver early (around 37 weeks) via cesarean section. You may have a hysterectomy (surgery to remove the uterus and cervix, and sometimes surrounding structures) at the same time as the cesarean section.

To learn more about hysterectomy, see Cervical Cancer Treatment (https://www.cancer.gov/types/cervical/treatment).

### Treatment of fast-growing or advanced stage cervical cancer in the first trimester

Tests will be done throughout your pregnancy to find out if the cancer has grown much larger or has spread outside of the cervix. Cervical cancer that is fast-growing or has evidence of spread outside the cervix to other tissues and organs may require immediate treatment, which may include

- hysterectomy, surgery to remove the uterus (womb), cervix, and sometimes surrounding structures
- chemotherapy
- radiation therapy

It is not possible to continue the pregnancy during any of these treatments. Chemotherapy is not safe for the fetus during the first trimester, and radiation therapy is harmful throughout fetal development.

To learn more about these treatments, see Cervical Cancer Treatment (https://www.cancer.gov/types/cervical/treatment).

### Treatment of stage I cervical cancer in the second or third trimester

If you are diagnosed with stage I cervical cancer during the second or third trimester of pregnancy, your cancer care team might suggest surgery with cold knife conization or radical trachelectomy.

Cold knife conization uses a scalpel to remove a cone-shaped piece of tissue from the cervix and cervical canal. Cold knife conization is done in the hospital under general anesthesia.

Radical trachelectomy (also called radical cervicectomy) removes the cervix, nearby tissue, and the upper part of the vagina. Lymph nodes may also be removed. After the surgeon removes the cervix, they attach the uterus to the remaining part of the vagina. A special stitch or band is placed on the uterus (in a procedure called a cerclage) to help keep the uterus closed during pregnancy.

Your cancer care team may suggest you deliver early via cesarean section. If all the cancer couldn’t be removed with cold knife conization or radical trachelectomy, you may receive other treatments after delivery, such as hysterectomy and radiation therapy.

To learn more about hysterectomy, see Cervical Cancer Treatment (https://www.cancer.gov/types/cervical/treatment).

### Treatment of stage II, III, or IV cervical cancer in the second or third trimester

If you are diagnosed with stage II, III, or IV cervical cancer during the second or third trimester of pregnancy, your cancer care team may suggest you continue the pregnancy and receive chemotherapy.

Chemotherapy, such as with cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin) or carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin) and paclitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/paclitaxel), given in the second or third trimester does not usually harm the fetus but may cause early labor and low birth weight.

Your cancer care team may suggest you deliver early via cesarean section so you can receive other treatments, such as hysterectomy and radiation therapy.

## Coping with Cervical Cancer

When you first learn that you have cervical cancer, it is normal to feel a mix of emotions. You may wonder how you will cope with the upcoming changes in your life. One step you can take is to be informed of the changes that may occur and what resources are available to help you cope. Doing so can give you a greater sense of control.

Resources on the common physical side effects of treatment for cervical cancer are provided in the Cervical Cancer Treatment (https://www.cancer.gov/types/cervical/treatment) section. Learn more about side effects caused by cancer treatment (https://www.cancer.gov/about-cancer/treatment/side-effects) and ways to manage them.

Because cervical cancer tends to occur in people of reproductive age, and because of where it forms in the body, certain aspects of your diagnosis and treatment are of special concern.

### Fertility issues

For some people, infertility can be one of the most difficult and upsetting long-term effects of cervical cancer treatment. Although it might feel overwhelming to think about, you may benefit from talking with you doctor about how treatment may affect your fertility and about options to preserve fertility. If you choose to take steps to preserve your fertility, your doctor and a fertility specialist will work together to develop a treatment plan that includes fertility preservation, whenever possible.

Learn more about which cancer treatments may affect fertility and about fertility-sparing treatment options in Fertility Issues in Girls and Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/fertility-women).

### Sexual problems

Some treatments for cervical cancer can cause short-term or long-term problems with sex after treatment. Sexual problems are often caused by changes to your body. These changes result from chemotherapy, radiation therapy, surgery, or certain medicines.

Learn more about the sexual problems some cancer treatments can cause and ways to cope and share your concerns with your health care team in Sexual Health Issues in Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-women).

### Body changes

Cervical cancer and its treatment can change how you look and feel about yourself. Know you aren't alone in how you feel. Coping with these changes can be hard. But, over time, most people learn to adjust to them and move forward.

Learn more about how body changes may affect your self-image and sex life after treatment and ways to cope and communicate your feelings in Self-Image and Sexuality (https://www.cancer.gov/about-cancer/coping/self-image).

### Stigma and guilt

Because cervical cancer results from a sexually transmitted infection with human papillomavirus (HPV), you may worry that some people assume your behavior caused your cancer. Or you may blame yourself for lifestyle choices you think could have led to your cancer. It is important to remember almost everyone will have an HPV infection at some point in their lives and that most HPV infections of the cervix will not cause cervical cancer. Having cervical cancer is not your fault. It may help you to share your feelings with someone. Let your doctor know if you would like to talk with a counselor or go to a support group.

Learn more about the emotions many people with cancer feel and ways to cope in Feelings and Cancer (https://www.cancer.gov/about-cancer/coping/feelings) and Cancer Support Groups (https://www.cancer.gov/about-cancer/coping/adjusting-to-cancer/support-groups).

### Financial toxicity

Cancer is one of the most costly diseases to treat in the United States. You may face major financial challenges and need help dealing with the costs of cervical cancer treatment, even if you have insurance. The problems a person has related to the cost of treatment is known as financial toxicity. Find out if you are at risk and learn about ways to cope in Financial Toxicity (Financial Distress) and Cancer Treatment and Managing Costs and Medical Information (https://www.cancer.gov/about-cancer/managing-care/track-care-costs).